# GATA2 Deficiency Syndrome (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of GATA2 deficiency syndrome. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction to GATA2 Deficiency Syndrome

Germline loss-of-function variants in the master hematopoietic transcription factor, GATA2, can cause cellular deficiencies that have a high propensity to develop into myeloid malignancies. Initial reports identified GATA2 deficiency in cohorts of patients with the following conditions:

- Familial myelodysplastic syndrome (MDS)/acute myeloid leukemia (AML).[1]
- Autosomal dominant and sporadic monocytopenias and mycobacterial infection (MonoMAC) syndrome.[2]
- Dendritic cell, monocyte, and B and natural killer (NK) lymphoid (DCML) deficiency.[3]
- Lymphedema and anogenital dysplasia (WILD) syndrome.[4]
- Primary lymphedema associated with a predisposition to AML (Emberger syndrome).[5]
- Unexplained chronic neutropenia.[6]
- Primary childhood MDS.[7]

Following these initial reports, it became well accepted that all of these clinical phenotypes represent the broad spectrum of GATA2 deficiency, a single genetic disease.

### References

Hahn CN, Chong CE, Carmichael CL, et al.: Heritable GATA2 mutations associated with familial myelodysplastic syndrome and acute myeloid leukemia. Nat Genet 43 (10): 1012-7, 2011.21892162
Hsu AP, Sampaio EP, Khan J, et al.: Mutations in GATA2 are associated with the autosomal dominant and sporadic monocytopenia and mycobacterial infection (MonoMAC) syndrome. Blood 118 (10): 2653-5, 2011.21670465
Dickinson RE, Griffin H, Bigley V, et al.: Exome sequencing identifies GATA-2 mutation as the cause of dendritic cell, monocyte, B and NK lymphoid deficiency. Blood 118 (10): 2656-8, 2011.21765025
Dorn JM, Patnaik MS, Van Hee M, et al.: WILD syndrome is GATA2 deficiency: A novel deletion in the GATA2 gene. J Allergy Clin Immunol Pract 5 (4): 1149-1152.e1, 2017 Jul - Aug.28373026
Ostergaard P, Simpson MA, Connell FC, et al.: Mutations in GATA2 cause primary lymphedema associated with a predisposition to acute myeloid leukemia (Emberger syndrome). Nat Genet 43 (10): 929-31, 2011.21892158
Pasquet M, Bellanné-Chantelot C, Tavitian S, et al.: High frequency of GATA2 mutations in patients with mild chronic neutropenia evolving to MonoMac syndrome, myelodysplasia, and acute myeloid leukemia. Blood 121 (5): 822-9, 2013.23223431
Wlodarski MW, Hirabayashi S, Pastor V, et al.: Prevalence, clinical characteristics, and prognosis of GATA2-related myelodysplastic syndromes in children and adolescents. Blood 127 (11): 1387-97; quiz 1518, 2016.26702063

## Genetics and Molecular Biology of GATA2 Deficiency Syndrome

GATA2 deficiency is caused by de novo or inherited, heterozygous, germline pathogenic variants in the GATA2 gene, which result in a loss of GATA2 expression or abnormal GATA2 transcription factor function.[1] Most patients with GATA2 deficiency carry null GATA2 variants (i.e., splice-site variants, nonsense variants, frameshift variants, whole-gene deletions, or synonymous variants that affect RNA splicing) or GATA2 missense variants that affect the zinc finger 2 domain. Approximately 10% of patients have noncoding substitutions in the EBOX-GATA-ETS enhancer element in intron 4 of GATA2, or occasionally, tandem duplications of the entire GATA2 locus.[1,2]

Variable expressivity is common in GATA2 deficiency. Some patients present early in life with one of the following: 1) cytopenias and bone marrow failure that progress to myelodysplastic syndrome (MDS)/acute myeloid leukemia (AML), or 2) severe immunodeficiency with recurrent bacterial, viral, and fungal infections.[3-9] Other patients with GATA2 deficiency develop MDS with excess blasts without preexisting clinical features.[10-12] Immunodeficiency is common in patients with GATA2 deficiency and manifests with mycobacterial infections, human papillomavirus (HPV) infections (i.e., generalized warts, intraepithelial neoplasia), Epstein-Barr virus (EBV)–related disease, herpes virus–related disease, and fungal infections. Some patients may also develop pulmonary disease (anti-granulocyte–macrophage colony stimulating factor [GM-CSF] antibody-negative pulmonary alveolar proteinosis), thrombosis, and autoimmune features like autoimmune cytopenias, hepatitis, colitis, panniculitis, and arthritis. Immunological laboratory findings can include deficiencies of the following: dendritic cells, monocytes, transitional B cells, and natural killer cells. Patients with GATA2 deficiency can also have inverted CD4:CD8 ratios and hypogammaglobulinemia. Loss of B cells and their precursors was shown to be the most common feature in GATA2-deficient patients with MDS.[12] Although not all patients with GATA2 deficiency present with immunological changes, a history of immunodeficiency in a patient with MDS/AML may be a strong indicator that a germline GATA2 pathogenic variant is present.[3,8,13]

### References

Homan CC, Venugopal P, Arts P, et al.: GATA2 deficiency syndrome: A decade of discovery. Hum Mutat 42 (11): 1399-1421, 2021.34387894
Singh P, Heer M, Resteu A, et al.: GATA2 deficiency phenotype associated with tandem duplication of GATA2 and overexpression of GATA2-AS1. Blood Adv 5 (24): 5631-5635, 2021.34638133
Hsu AP, Sampaio EP, Khan J, et al.: Mutations in GATA2 are associated with the autosomal dominant and sporadic monocytopenia and mycobacterial infection (MonoMAC) syndrome. Blood 118 (10): 2653-5, 2011.21670465
Pasquet M, Bellanné-Chantelot C, Tavitian S, et al.: High frequency of GATA2 mutations in patients with mild chronic neutropenia evolving to MonoMac syndrome, myelodysplasia, and acute myeloid leukemia. Blood 121 (5): 822-9, 2013.23223431
Dickinson RE, Milne P, Jardine L, et al.: The evolution of cellular deficiency in GATA2 mutation. Blood 123 (6): 863-74, 2014.24345756
Kazenwadel J, Secker GA, Liu YJ, et al.: Loss-of-function germline GATA2 mutations in patients with MDS/AML or MonoMAC syndrome and primary lymphedema reveal a key role for GATA2 in the lymphatic vasculature. Blood 119 (5): 1283-91, 2012.22147895
Mir MA, Kochuparambil ST, Abraham RS, et al.: Spectrum of myeloid neoplasms and immune deficiency associated with germline GATA2 mutations. Cancer Med 4 (4): 490-9, 2015.25619630
Calvo KR, Vinh DC, Maric I, et al.: Myelodysplasia in autosomal dominant and sporadic monocytopenia immunodeficiency syndrome: diagnostic features and clinical implications. Haematologica 96 (8): 1221-5, 2011.21508125
Ganapathi KA, Townsley DM, Hsu AP, et al.: GATA2 deficiency-associated bone marrow disorder differs from idiopathic aplastic anemia. Blood 125 (1): 56-70, 2015.25359990
Hahn CN, Chong CE, Carmichael CL, et al.: Heritable GATA2 mutations associated with familial myelodysplastic syndrome and acute myeloid leukemia. Nat Genet 43 (10): 1012-7, 2011.21892162
Wlodarski MW, Hirabayashi S, Pastor V, et al.: Prevalence, clinical characteristics, and prognosis of GATA2-related myelodysplastic syndromes in children and adolescents. Blood 127 (11): 1387-97; quiz 1518, 2016.26702063
Nováková M, Žaliová M, Suková M, et al.: Loss of B cells and their precursors is the most constant feature of GATA-2 deficiency in childhood myelodysplastic syndrome. Haematologica 101 (6): 707-16, 2016.27013649
Dickinson RE, Griffin H, Bigley V, et al.: Exome sequencing identifies GATA-2 mutation as the cause of dendritic cell, monocyte, B and NK lymphoid deficiency. Blood 118 (10): 2656-8, 2011.21765025

## Clinical Phenotypes in GATA2 Deficiency Syndrome

Approximately half of reported patients with GATA2 pathogenic variants have constitutional features of GATA2 deficiency. Constitutional features of GATA2 deficiency include the following:[1,2]

- Congenital sensorineural deafness.
- Lymphedema.
- Hydrocele.
- Urogenital malformations.
- Attention deficit hyperactivity disorder (ADHD) spectrum disorders.

GATA2 deficiency prevalence is dependent upon several factors, including a patient's age and clinical manifestations. A myelodysplastic syndrome (MDS) cohort study estimated that germline GATA2 pathogenic variants were present in approximately 0.5% of adults and 7% of children.[1] Commonly acquired genetic lesions in GATA2 deficiency-related MDS include the following:[3-8]

- Abnormal karyotypes (monosomy 7, der(1;7) translocation, and trisomy 8).
- Somatic variants, particularly in the ASXL1, SETBP1, STAG2, and RUNX1 genes.

In children with GATA2-related MDS, monosomy 7 has been reported in up to 70% to 80% of cases. However, in adults, the frequencies of both trisomy 8 and monosomy 7 were approximately 20% to 40%.[9] It is recommended that monosomy 7 in a young patient trigger GATA2 germline testing, since up to 72% of adolescents with an MDS diagnosis and monosomy 7 carry germline GATA2 pathogenic variants.[1] The der (1;7) chromosomal abnormality is a cytogenetic lesion that is also enriched in patients with GATA2 deficiency.[10]

The lifetime risk of developing myeloid neoplasms (MDS, myeloproliferative neoplasms, acute myeloid leukemia [AML]) is very high in individuals with GATA2 deficiency. The median age of myeloid neoplasm diagnosis was estimated to be 12 years in pediatric cohorts [1] and 35 years in adult cohorts.[5] Consolidated data from several studies suggest that the average age of myeloid neoplasm diagnosis was 20 years,[9] and the median age of diagnosis is 17 years (range, 0–78 y).[11] Infants and young children are typically not affected with myeloid malignancy or clinically relevant immunodeficiencies. However, these symptoms can manifest as early as age 4 to 5 years.[1] The lifetime penetrance of GATA2 deficiency is high (estimated as >80%), and thus far, only a small proportion of GATA2 carriers reported not having symptoms.

Genotype/phenotype correlative studies found that lymphedema is associated with GATA2 null pathogenic variants.[11] However, correlations between GATA2 variant type and hematopoietic malignancy development have not yet been established. Additional research is required to investigate whether different types of GATA2 variants have differing penetrance rates.

### References

Wlodarski MW, Hirabayashi S, Pastor V, et al.: Prevalence, clinical characteristics, and prognosis of GATA2-related myelodysplastic syndromes in children and adolescents. Blood 127 (11): 1387-97; quiz 1518, 2016.26702063
Spinner MA, Sanchez LA, Hsu AP, et al.: GATA2 deficiency: a protean disorder of hematopoiesis, lymphatics, and immunity. Blood 123 (6): 809-21, 2014.24227816
Homan CC, Drazer MW, Yu K, et al.: Somatic mutational landscape of hereditary hematopoietic malignancies caused by germline variants in RUNX1, GATA2, and DDX41. Blood Adv 7 (20): 6092-6107, 2023.37406166
Largeaud L, Collin M, Monselet N, et al.: Somatic genetic alterations predict hematological progression in GATA2 deficiency. Haematologica 108 (6): 1515-1529, 2023.36727400
West RR, Hsu AP, Holland SM, et al.: Acquired ASXL1 mutations are common in patients with inherited GATA2 mutations and correlate with myeloid transformation. Haematologica 99 (2): 276-81, 2014.24077845
Pastor V, Hirabayashi S, Karow A, et al.: Mutational landscape in children with myelodysplastic syndromes is distinct from adults: specific somatic drivers and novel germline variants. Leukemia 31 (3): 759-762, 2017.27876779
Fisher KE, Hsu AP, Williams CL, et al.: Somatic mutations in children with GATA2-associated myelodysplastic syndrome who lack other features of GATA2 deficiency. Blood Adv 1 (7): 443-448, 2017.29296959
McReynolds LJ, Yang Y, Yuen Wong H, et al.: MDS-associated mutations in germline GATA2 mutated patients with hematologic manifestations. Leuk Res 76: 70-75, 2019.30578959
Wlodarski MW, Collin M, Horwitz MS: GATA2 deficiency and related myeloid neoplasms. Semin Hematol 54 (2): 81-86, 2017.28637621
Kozyra EJ, Göhring G, Hickstein DD, et al.: Association of unbalanced translocation der(1;7) with germline GATA2 mutations. Blood 138 (23): 2441-2445, 2021.34469508
Homan CC, Venugopal P, Arts P, et al.: GATA2 deficiency syndrome: A decade of discovery. Hum Mutat 42 (11): 1399-1421, 2021.34387894

## Management and Prognosis for GATA2 Deficiency Syndrome

Consensus guidelines on the management of GATA2 deficiency do not yet exist, and hence, surveillance strategies are individually tailored for each patient. Most patients are followed by hematologists, immunologists, or transplant physicians. General GATA2 deficiency management recommendations include the following: periodic analysis of peripheral blood counts and immune status, yearly bone marrow evaluation with cytogenetics and somatic variant testing, and screening for human papillomavirus (HPV)–related cancers.[1,2] Patients with severe cellular deficiencies may require antimicrobial prophylaxis.[3] Due to the risk of clonal evolution, treatment with granulocyte colony-stimulating factor (G-CSF) is generally avoided in neutropenic patients with GATA2 deficiency.

It is widely accepted that timely hematopoietic stem cell transplantation (HSCT) is the only curative approach for symptomatic GATA2-deficient patients. HSCT outcomes are influenced by several patient factors, including myelodysplastic syndrome (MDS) subtype and the presence of a preexisting immunodeficiency. Overall survival (OS) rates for patients who underwent HSCT for various indications were reported as follows: 54% for MDS/acute myeloid leukemia (AML) or immunodeficiency,[4] 66% in children with MDS and monosomy 7,[5] 88% in children with refractory cytopenia of childhood (RCC) and normal karyotypes,[6] and 86% in young adults with immunodeficiency.[7] Difficulty in predicting the disease’s course complicates decision making regarding the optimal timing of HSCT. In 2021, researchers examined HSCT outcomes in 65 patients with GATA2-related MDS.[8] Five years after HSCT, the probability of OS and disease-free survival (DFS) was 75% and 70%, respectively. Nonrelapse mortality and relapse equally contributed to treatment failure. There was no evidence of increased graft-versus-host-disease incidence, excessive rates of infections, or organ toxicities. Advanced MDS and monosomy 7 were associated with worse outcomes. Patients who had RCC with normal karyotypes had better outcomes (DFS rate, 90%) when compared with those who had RCC and monosomy 7 (DFS rate, 67%).

HSCT is indicated in GATA2-deficient patients with the following: recurrent infections, transfusion dependency, or clonal evolution into a myeloid malignancy.[9-11] Several cases of donor-derived MDS/AML have been reported after HSCT in families with GATA2 deficiency.[12,13] This emphasizes the need for genetic counseling, assessment for the presence of GATA2-specific clinical features, and genetic testing in potential familial donors.

### References

Collin M, Dickinson R, Bigley V: Haematopoietic and immune defects associated with GATA2 mutation. Br J Haematol 169 (2): 173-87, 2015.25707267
Davies SM: Monitoring and treatment of MDS in genetically susceptible persons. Hematology Am Soc Hematol Educ Program 2019 (1): 105-109, 2019.31808891
Hsu AP, McReynolds LJ, Holland SM: GATA2 deficiency. Curr Opin Allergy Clin Immunol 15 (1): 104-9, 2015.25397911
Spinner MA, Sanchez LA, Hsu AP, et al.: GATA2 deficiency: a protean disorder of hematopoiesis, lymphatics, and immunity. Blood 123 (6): 809-21, 2014.24227816
Wlodarski MW, Hirabayashi S, Pastor V, et al.: Prevalence, clinical characteristics, and prognosis of GATA2-related myelodysplastic syndromes in children and adolescents. Blood 127 (11): 1387-97; quiz 1518, 2016.26702063
Sahoo SS, Pastor VB, Goodings C, et al.: Clinical evolution, genetic landscape and trajectories of clonal hematopoiesis in SAMD9/SAMD9L syndromes. Nat Med 27 (10): 1806-1817, 2021.34621053
Parta M, Shah NN, Baird K, et al.: Allogeneic Hematopoietic Stem Cell Transplantation for GATA2 Deficiency Using a Busulfan-Based Regimen. Biol Blood Marrow Transplant 24 (6): 1250-1259, 2018.29412158
Bortnick R, Wlodarski M, de Haas V, et al.: Hematopoietic stem cell transplantation in children and adolescents with GATA2-related myelodysplastic syndrome. Bone Marrow Transplant 56 (11): 2732-2741, 2021.34244664
Förster A, Davenport C, Duployez N, et al.: European standard clinical practice - Key issues for the medical care of individuals with familial leukemia. Eur J Med Genet 66 (4): 104727, 2023.36775010
Clark A, Thomas S, Hamblin A, et al.: Management of patients with germline predisposition to haematological malignancies considered for allogeneic blood and marrow transplantation: Best practice consensus guidelines from the UK Cancer Genetics Group (UKCGG), CanGene-CanVar, NHS England Genomic Laboratory Hub (GLH) Haematological Malignancies Working Group and the British Society of Blood and Marrow Transplantation and cellular therapy (BSBMTCT). Br J Haematol 201 (1): 35-44, 2023.36786081
Parta M, Cole K, Avila D, et al.: Hematopoietic Cell Transplantation and Outcomes Related to Human Papillomavirus Disease in GATA2 Deficiency. Transplant Cell Ther 27 (5): 435.e1-435.e11, 2021.33965189
Galera P, Hsu AP, Wang W, et al.: Donor-derived MDS/AML in families with germline GATA2 mutation. Blood 132 (18): 1994-1998, 2018.30232126
Sakata N, Okano M, Masako R, et al.: Donor-derived myelodysplastic syndrome after allogeneic stem cell transplantation in a family with germline GATA2 mutation. Int J Hematol 113 (2): 290-296, 2021.32865708

## Latest Updates to this Summary (08/22/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This is a new summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about GATA2 deficiency syndrome. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for GATA2 Deficiency Syndrome are:

- Julia Cooper, MS, CGC (Ohio State University)
- Courtney DiNardo, MD, MSC (University of Texas, M.D. Anderson Cancer Center)
- Marcin Wlodarski, MD, PhD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ GATA2 Deficiency Syndrome. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/gata2. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).